# Childhood Craniopharyngioma Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood craniopharyngioma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Childhood Craniopharyngioma

Primary brain tumors, including craniopharyngiomas, are a diverse group of diseases that together constitute the most common solid tumors of childhood. Brain tumors are classified according to an integrated assessment of histology and molecular characteristics, with tumor location and extent of spread as important factors that affect treatment and prognosis.

Craniopharyngiomas are uncommon pediatric brain tumors. They are believed to be congenital in origin, arising from ectodermal remnants, Rathke cleft, or other embryonal epithelium. They often occur in the suprasellar region with an intrasellar portion. Magnetic resonance imaging (MRI) and computed tomography (CT) imaging are used to diagnose craniopharyngiomas, but histological confirmation is generally required before treatment.

The treatment of patients with newly diagnosed craniopharyngiomas may include surgery, radiation therapy, cyst drainage, and intracystic therapies. The treatment of patients with recurrent craniopharyngiomas depends on the initial treatment used. With current treatment strategies, the 5-year and 10-year survival rates reach 80% to 90% for children between the ages of 0 and 14 years.[1]

The PDQ childhood brain tumor treatment summaries are organized primarily according to the World Health Organization Classification of Central Nervous System (CNS) Tumours.[2,3] For a full description of the classification of CNS tumors and a link to the corresponding treatment summary for each type of brain tumor, see Childhood Brain and Spinal Cord Tumors Summary Index.

### Incidence

Craniopharyngiomas are relatively uncommon, accounting for about 3% of all intracranial tumors in children.[1,4,5]

No predisposing factors have been identified.

### Anatomy

Figure 1. Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain. The tentorium separates the cerebrum from the cerebellum. The infratentorium (posterior fossa) is the region below the tentorium that contains the brain stem, cerebellum, and fourth ventricle. The supratentorium is the region above the tentorium and denotes the region that contains the cerebrum.

Drawing of the inside of the brain showing the supratentorial area (the upper part of the brain) and the posterior fossa/infratentorial area (the lower back part of the brain). The supratentorial area contains the cerebrum, lateral ventricle, third ventricle, choroid plexus, hypothalamus, pineal gland, pituitary gland, and optic nerve. The posterior fossa/infratentorial area contains the cerebellum, tectum, fourth ventricle, and brain stem (pons and medulla). The tentorium and spinal cord are also shown.

### Clinical Presentation

Craniopharyngiomas occur in the suprasellar region, near the pituitary gland, optic nerves, and optic chiasm (see Figure 2). This proximity commonly leads to injury of these surrounding structures, both by the tumor and interventions used to treat the tumor. Endocrine function is most frequently affected,[6-11] with patients suffering from neuroendocrine deficits such as growth hormone, thyroid, and cortisol deficiencies. Additionally, tumor proximity to the optic nerves and chiasm may result in visual compromise.[12][Level of evidence C1]; [7,13-15] Some patients present with obstructive hydrocephalus caused by tumor growth within the third ventricle. Rarely, tumors may extend into the posterior fossa, and patients may present with headache, diplopia, ataxia, and hearing loss.[16]

Figure 2. Drawing showing a coronal view of the inside of the brain where craniopharyngiomas may form. The tumor usually occurs in the region of the pituitary gland, near the optic chiasm and optic nerves.

Drawing showing a coronal view of areas of the brain that may be affected by craniopharyngioma, including the pituitary gland and the optic chiasm. Also shown is the oculomotor nerve (III), trochlear nerve (IV), abducens nerve (VI), ophthalmic nerve (V1), maxillary nerve (V2), internal carotid artery, and the cavernous and sphenoid sinuses.

### Diagnostic Evaluation

CT and MRI scans are often diagnostic for childhood craniopharyngiomas, with most tumors demonstrating intratumoral calcifications and a solid and cystic component. MRI of the spinal axis is not routinely performed.

Craniopharyngiomas without calcification may be confused with other tumor types, including germ cell tumors, hypothalamic/chiasmatic astrocytomas, or Langerhans cell histiocytosis. Biopsy or resection is required to confirm the diagnosis.[17]

Apart from imaging, patients undergo endocrine testing and formal vision examination, including visual-field evaluation.

### Prognosis

Regardless of the treatment modality, the 5-year and 10-year overall survival rates range from 80% to 90% in children between the ages of 0 and 14 years.[1,18-21] The event-free survival (EFS) rates can be more variable, depending on therapy and clinical characteristics of the patient and tumor. EFS rates range from 23% for younger children to 65% for school-aged children.[22,23]

### References

Ostrom QT, Cioffi G, Waite K, et al.: CBTRUS Statistical Report: Primary Brain and Other Central Nervous System Tumors Diagnosed in the United States in 2014-2018. Neuro Oncol 23 (12 Suppl 2): iii1-iii105, 2021.34608945
Louis DN, Perry A, Wesseling P, et al.: The 2021 WHO Classification of Tumors of the Central Nervous System: a summary. Neuro Oncol 23 (8): 1231-1251, 2021.34185076
WHO Classification of Tumours Editorial Board, ed.: WHO Classification of Tumours: Central Nervous System Tumours. Vol. 6. 5th ed. IARC Press; 2021.
Karavitaki N, Wass JA: Craniopharyngiomas. Endocrinol Metab Clin North Am 37 (1): 173-93, ix-x, 2008.18226736
Garnett MR, Puget S, Grill J, et al.: Craniopharyngioma. Orphanet J Rare Dis 2: 18, 2007.17425791
van Schaik J, Hoving EW, Müller HL, et al.: Hypothalamic-Pituitary Outcome after Treatment for Childhood Craniopharyngioma. Front Horm Res 54: 47-57, 2021.33965963
Jimenez RB, Ahmed S, Johnson A, et al.: Proton Radiation Therapy for Pediatric Craniopharyngioma. Int J Radiat Oncol Biol Phys 110 (5): 1480-1487, 2021.33662460
Bogusz A, Müller HL: Childhood-onset craniopharyngioma: latest insights into pathology, diagnostics, treatment, and follow-up. Expert Rev Neurother 18 (10): 793-806, 2018.30257123
Tan TS, Patel L, Gopal-Kothandapani JS, et al.: The neuroendocrine sequelae of paediatric craniopharyngioma: a 40-year meta-data analysis of 185 cases from three UK centres. Eur J Endocrinol 176 (3): 359-369, 2017.28073908
Cohen M, Bartels U, Branson H, et al.: Trends in treatment and outcomes of pediatric craniopharyngioma, 1975-2011. Neuro Oncol 15 (6): 767-74, 2013.23486689
Fouda MA, Scott RM, Marcus KJ, et al.: Sixty years single institutional experience with pediatric craniopharyngioma: between the past and the future. Childs Nerv Syst 36 (2): 291-296, 2020.31292757
Nuijts MA, Veldhuis N, Stegeman I, et al.: Visual functions in children with craniopharyngioma at diagnosis: A systematic review. PLoS One 15 (10): e0240016, 2020.33002047
Wan MJ, Zapotocky M, Bouffet E, et al.: Long-term visual outcomes of craniopharyngioma in children. J Neurooncol 137 (3): 645-651, 2018.29344823
Ravindra VM, Okcu MF, Ruggieri L, et al.: Comparison of multimodal surgical and radiation treatment methods for pediatric craniopharyngioma: long-term analysis of progression-free survival and morbidity. J Neurosurg Pediatr 28 (2): 152-159, 2021.34049281
Felicetti F, Brignardello E, van Santen HM, eds.: Endocrine and Metabolic Late Effects in Cancer Survivors. Basel, Switzerland: Karger, 2021.
Zhou L, Luo L, Xu J, et al.: Craniopharyngiomas in the posterior fossa: a rare subgroup, diagnosis, management and outcomes. J Neurol Neurosurg Psychiatry 80 (10): 1150-4, 2009.19762904
Rossi A, Cama A, Consales A, et al.: Neuroimaging of pediatric craniopharyngiomas: a pictorial essay. J Pediatr Endocrinol Metab 19 (Suppl 1): 299-319, 2006.16700305
Muller HL: Childhood craniopharyngioma. Recent advances in diagnosis, treatment and follow-up. Horm Res 69 (4): 193-202, 2008.18204266
Müller HL: Childhood craniopharyngioma--current concepts in diagnosis, therapy and follow-up. Nat Rev Endocrinol 6 (11): 609-18, 2010.20877295
Zacharia BE, Bruce SS, Goldstein H, et al.: Incidence, treatment and survival of patients with craniopharyngioma in the surveillance, epidemiology and end results program. Neuro Oncol 14 (8): 1070-8, 2012.22735773
Ostrom QT, Cioffi G, Gittleman H, et al.: CBTRUS Statistical Report: Primary Brain and Other Central Nervous System Tumors Diagnosed in the United States in 2012-2016. Neuro Oncol 21 (Suppl 5): v1-v100, 2019.31675094
Beckhaus J, Friedrich C, Boekhoff S, et al.: Outcome after pediatric craniopharyngioma: the role of age at diagnosis and hypothalamic damage. Eur J Endocrinol 188 (3): , 2023.36857103
Merchant TE, Dangda S, Hoehn ME, et al.: Pediatric Craniopharyngioma: The Effect of Visual Deficits and Hormone Deficiencies on Long-Term Cognitive Outcomes After Conformal Photon Radiation Therapy. Int J Radiat Oncol Biol Phys 115 (3): 581-591, 2023.36130625

## Histopathological Classification of Childhood Craniopharyngioma

Craniopharyngiomas are histologically benign and often occur in the suprasellar region, with an intrasellar portion. They may be locally invasive and typically do not metastasize to remote brain locations.

Craniopharyngiomas are classified under the category of tumors of the sella region according to the defined entities below. The two entities were previously described as subtypes of craniopharyngioma. However, based on the different populations they tend to affect, combined with distinct clinical, histological, and molecular characteristics, these are now considered unique diagnoses.[1]

- Adamantinomatous: Adamantinomatous craniopharyngiomas most frequently occur in children.[2] These tumors are typically composed of a solid portion formed by nests and trabeculae of epithelial tumor cells, with an abundance of calcification, and a cystic component that is filled with a dark, oily fluid. Wet keratin is also characteristic of this tumor type. Adamantinomatous craniopharyngiomas are more locally aggressive than are papillary craniopharyngiomas and have a significantly higher rate of recurrence.[3] Activating CTNNB1 gene variants are found in most adamantinomatous tumors.[1,4-6]
- Papillary: Papillary craniopharyngiomas occur primarily in adults. BRAF V600E variants are observed in nearly all papillary craniopharyngiomas.[1,5,6]

### References

Louis DN, Perry A, Wesseling P, et al.: The 2021 WHO Classification of Tumors of the Central Nervous System: a summary. Neuro Oncol 23 (8): 1231-1251, 2021.34185076
Karavitaki N, Wass JA: Craniopharyngiomas. Endocrinol Metab Clin North Am 37 (1): 173-93, ix-x, 2008.18226736
Pekmezci M, Louie J, Gupta N, et al.: Clinicopathological characteristics of adamantinomatous and papillary craniopharyngiomas: University of California, San Francisco experience 1985-2005. Neurosurgery 67 (5): 1341-9; discussion 1349, 2010.20871436
Sekine S, Shibata T, Kokubu A, et al.: Craniopharyngiomas of adamantinomatous type harbor beta-catenin gene mutations. Am J Pathol 161 (6): 1997-2001, 2002.12466115
Brastianos PK, Taylor-Weiner A, Manley PE, et al.: Exome sequencing identifies BRAF mutations in papillary craniopharyngiomas. Nat Genet 46 (2): 161-5, 2014.24413733
Goschzik T, Gessi M, Dreschmann V, et al.: Genomic Alterations of Adamantinomatous and Papillary Craniopharyngioma. J Neuropathol Exp Neurol 76 (2): 126-134, 2017.28069929

## Stage Information for Childhood Craniopharyngioma

There is no generally applied staging system for childhood craniopharyngiomas. For treatment purposes, patients are grouped as having newly diagnosed or recurrent disease.

## Treatment Option Overview for Childhood Craniopharyngioma

Treatments for pediatric craniopharyngiomas have traditionally included maximal safe surgical resection and radiation therapy to treat residual tumor. Additionally, intracystic therapies such as radioactive phosphorus P 32, bleomycin, and interferon-alpha have been used. Evidence has demonstrated that conservative surgical approaches lead to better neuroendocrine and quality-of-life outcomes in patients.[1,2] Additionally, as the biological understanding of molecular and inflammatory drivers of these tumors have been identified, targeted therapies are now being studied.

Table 1 describes the treatment options for newly diagnosed and recurrent childhood craniopharyngioma.

Table 1. Treatment Options for Childhood Craniopharyngioma

Treatment Group | Treatment Options
Newly diagnosed childhood craniopharyngioma | Complete resection with or without radiation therapy
Newly diagnosed childhood craniopharyngioma | Subtotal resection with radiation therapy
Newly diagnosed childhood craniopharyngioma | Primary cyst drainage with or without radiation therapy
Newly diagnosed childhood craniopharyngioma | Intracystic therapy
Progressive or recurrent childhood craniopharyngioma | Surgery
Progressive or recurrent childhood craniopharyngioma | Radiation therapy, including radiosurgery
Progressive or recurrent childhood craniopharyngioma | Intracystic therapy (intracavitary instillation of radioactive phosphorus P 32 or bleomycin for those with cystic recurrences, where these agents are available)
Progressive or recurrent childhood craniopharyngioma | Systemic and targeted therapy
Progressive or recurrent childhood craniopharyngioma | Observation

### References

Lohkamp LN, Kasper EM, Pousa AE, et al.: An update on multimodal management of craniopharyngioma in children. Front Oncol 13: 1149428, 2023.37213301
Bogusz A, Müller HL: Childhood-onset craniopharyngioma: latest insights into pathology, diagnostics, treatment, and follow-up. Expert Rev Neurother 18 (10): 793-806, 2018.30257123

## Treatment of Newly Diagnosed Childhood Craniopharyngioma

There is no consensus on the optimal treatment for patients with newly diagnosed craniopharyngioma, in part because of the lack of prospective randomized trials that compare the different treatment options. Treatment is individualized on the basis of the following factors:

- Tumor size.
- Tumor location.
- Extension of the tumor.
- Potential short-term and long-term toxicity, partially related to baseline neuroendocrine and vision deficits (i.e., more conservative surgical approaches may be prioritized in patients who do not have existing neuroendocrine or visual deficits to mitigate the risk of surgical morbidity).[1]

Established treatment options for newly diagnosed childhood craniopharyngioma include the following:

1. Complete resection with or without radiation therapy.
2. Subtotal resection with radiation therapy.
3. Primary cyst drainage with or without radiation therapy.
4. Intracystic therapy.

### Complete Resection With or Without Radiation Therapy

It may be possible to remove all visible tumor and achieve long-term disease control.[2-4][Level of evidence C1] A 5-year progression-free survival (PFS) rate of about 65% has been reported.[5] Reported recurrence rates range from less than 10% to nearly 50%.[6,7] Gross-total resection is often technically challenging because the tumor is surrounded by vital structures, including the optic nerves and chiasm, the carotid artery and its branches, the pituitary and hypothalamus, and the third cranial nerve. These structures may limit the ability to remove the entire tumor. Conservative surgical approaches are often used to preserve functional and quality-of-life outcomes.[8,9][Level of evidence C1]

Many surgical approaches have been described, and the choice is determined by tumor size, location, extension, and the patient's baseline signs and symptoms of disease. Surgical approaches include the following:

- Craniotomy: As noted above, gross-total resection may be technically challenging because the tumor is surrounded by vital structures. The surgeon often has a limited view of the hypothalamic and sellar regions, and portions of the mass may remain after surgery, accounting for some recurrences. An understanding of the complex variations in how the tumors grow anatomically may help facilitate gross-total resection.[10] Nonetheless, almost all craniopharyngiomas attach to the pituitary stalk. Of the patients who undergo complete resection, virtually all will require lifelong pituitary hormone replacement with multiple medications.[3,11]
- Transsphenoidal approach: A transsphenoidal approach has been proven possible in patients of all ages and for tumors of various sizes localized within the sella.[12]; [13][Level of evidence C1] The development of expanded endonasal techniques with endoscopic visualization has allowed increased use of this approach, even for sizeable childhood tumors, which is similar to the experience in adults.[14] A complete resection can be obtained using this approach, with associated complications of panhypopituitarism and the risk of cerebrospinal fluid leaks.[15,16] When an endonasal approach is not possible, a craniotomy is required.

Complications of complete resection using either approach include the following:

- Obesity, which can be life-threatening.[17]
- Need for hormone replacement therapy.[18]
- Severe behavioral problems.[18]
- Blindness.
- Seizures.
- Spinal fluid leak.
- False aneurysms.
- Difficulty with eye movements.
- Death from intraoperative hemorrhage, hypothalamic damage, or stroke (rare).

If the surgeon indicates that the tumor was not completely removed or if postoperative imaging reveals residual craniopharyngioma, radiation therapy may be recommended to prevent early progression.[19][Level of evidence C2] For more information, see the Subtotal Resection With Radiation Therapy section.

Routine surveillance using magnetic resonance imaging is performed for several years after complete resection because of the possibility of tumor recurrence.

### Subtotal Resection With Radiation Therapy

The goal of limited surgery can be to establish a diagnosis, drain cystic components of the tumor, and decompress surrounding anatomical structures. In subtotal resections, removal of the tumor from the pituitary stalk or hypothalamus is typically avoided to minimize the late effects associated with complete resection.[20]

Surgery is often followed by radiation therapy, because radiation therapy can decrease the risk of recurrence after a subtotal resection.[21] With this approach, the 5-year PFS rates are approximately 70% to 90%,[5,22-25]; [26][Level of evidence C1] and the 10-year overall survival (OS) rates exceed 90%, which are similar to the rates in patients who undergo a gross-total resection.[27,28][Level of evidence C1]; [29][Level of evidence C2] Most often, radiation therapy is timed to immediately follow subtotal resection. However, in certain cases, such as in young patients or in patients without existing neuroendocrine or visual deficits, serial imaging may be used to delay or avoid radiation therapy for as long as feasible.[7,30] The standard approach to radiation therapy involves fractionated external-beam radiation, with a recommended dose of 50 to 54 Gy, in 1.8-Gy fractions, restricting the optic chiasm dose to 54 Gy.[31-34] Newer radiation technologies such as intensity-modulated photon therapy and proton-beam radiation therapy may reduce the radiation dose to uninvolved parts of the brain and spare normal tissue.[23,34-36] It is unknown whether such techniques reduce the late effects of radiation therapy.[26,34,36,37] Transient cyst enlargement may be noted during radiation therapy, and serial imaging may be required during radiation therapy to assess cyst changes and consider updates to radiation mapping.[38][Level of evidence C3]

Surgical complications with a subtotal resection can be similar to, but are less likely than, with a complete resection. If radiation therapy is used, additional complications must be considered, including the following:

- Loss of pituitary hormonal function.
- Cognitive dysfunction.
- Development of late strokes and vascular malformations.
- Delayed blindness.
- Development of second tumors.
- Malignant transformation of the primary tumor within the radiation field (rare).[39,40]

A phase II single-arm study included 94 patients (aged 12 months to 21 years) with craniopharyngiomas who were treated with proton-beam radiation therapy after individualized surgical resection. These patients were compared with a historical cohort of patients who were treated with photon-beam radiation therapy.[41] The survival outcomes of patients who received proton therapy were similar to those of patients who received photon therapy. The cumulative incidence rates of necrosis, vasculopathy, changes in vision, and severe complications were also similar between the two groups of patients. However, patients treated with proton therapy in the more recent cohort had superior cognitive outcomes.

A long-term study of 101 children who were treated for craniopharyngiomas evaluated visual, neurocognitive, and endocrine outcomes after photon radiation therapy. Race and presence of a shunt affected baseline scores.[42] For children who presented with lower intelligence quotient (IQ) scores at diagnosis, the impact of treatment often resulted in an IQ score reduction to the borderline mental disability range of 70 to 84. The investigators demonstrated that age at treatment (younger children had worse outcomes), radiation dose to the temporal lobes and hippocampi, and visual impairment significantly impacted neurocognitive function after radiation therapy. This study demonstrates the importance of these factors in the treatment and late effects of craniopharyngioma.

A report from the prospective registry study KiProReg examined the use of proton-beam therapy in 84 children younger than 18 years with craniopharyngioma.[43] The estimated 3-year OS rate was 98.2%, and the PFS rate was 94.7%. With a median follow-up of 4.3 years, late toxicities appeared acceptable. Sixty-three of the patients were treated with pencil-beam scanning, which is considered an advancement in proton technology.

### Primary Cyst Drainage With or Without Radiation Therapy

For predominantly cystic craniopharyngiomas, stereotactic drainage of the cyst, insertion of a catheter from which drainage can be facilitated, or cyst fenestration are other therapeutic alternatives.[7,44] This can be followed by observation or radiation therapy, depending on clinical and tumor characteristics . This procedure may also allow the surgeon to use the following two-staged approach:[45]

1. Draining the cyst to relieve pressure and complicating symptoms.
2. Resecting the tumor or employing radiation therapy later.

### Intracystic Therapy

Intracystic therapies include peginterferon alpha, radioactive phosphorus P 32 (32P) or other compounds,[46-48]; [49][Level of evidence B4] and interferon-alpha (which is no longer commercially available).[50]; [51][Level of evidence C1]; [52][Level of evidence C2] Bleomycin has previously been used.[53]; [54][Level of evidence C2]

A systematic review of publications on the treatment of cystic craniopharyngiomas with radioisotope brachytherapy from 2010 to 2021 identified 66 pediatric patients (N = 228).[55] With a minimum follow-up of 5 years, partial and complete responses were achieved in 89% of children with purely cystic lesions, compared with 58% of children with nonexclusively cystic lesions. Visual improvement was achieved in 64% of the patients with purely cystic lesions, and endocrine improvement was achieved in 20% of these patients. The observed progression rate was 3% for patients with purely cystic lesions. Treatment with intracystic brachytherapy, most commonly using 32P and yttrium Y 90, can be considered for patients with purely cystic craniopharyngiomas.

### Treatment Options Under Clinical Evaluation

Information about NCI-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search/advanced). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

Preclinical contemporary evaluations have identified active molecular and immune pathways in craniopharyngioma that may be targetable using commercially available or investigational agents. Specifically, MAPK and RAF pathways and immune/inflammatory targets such as PD-1 pathway components and IL-6 have been identified.[7,56-61][Level of evidence C1]

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

- NCT05465174 (https://www.cancer.gov/clinicaltrials/NCT05465174) (Nivolumab and Tovorafenib [DAY101] for Treatment of Craniopharyngioma in Children and Young Adults): This study assesses the tolerability and efficacy of combination therapy with PD-1 (nivolumab) and pan-RAF kinase (tovorafenib) inhibition for the treatment of children and young adults with craniopharyngioma.

### References

Cohen M, Bartels U, Branson H, et al.: Trends in treatment and outcomes of pediatric craniopharyngioma, 1975-2011. Neuro Oncol 15 (6): 767-74, 2013.23486689
Mortini P, Losa M, Pozzobon G, et al.: Neurosurgical treatment of craniopharyngioma in adults and children: early and long-term results in a large case series. J Neurosurg 114 (5): 1350-9, 2011.21214336
Elliott RE, Hsieh K, Hochm T, et al.: Efficacy and safety of radical resection of primary and recurrent craniopharyngiomas in 86 children. J Neurosurg Pediatr 5 (1): 30-48, 2010.20043735
Zhang YQ, Ma ZY, Wu ZB, et al.: Radical resection of 202 pediatric craniopharyngiomas with special reference to the surgical approaches and hypothalamic protection. Pediatr Neurosurg 44 (6): 435-43, 2008.19018151
Yang I, Sughrue ME, Rutkowski MJ, et al.: Craniopharyngioma: a comparison of tumor control with various treatment strategies. Neurosurg Focus 28 (4): E5, 2010.20367362
Müller HL, Merchant TE, Puget S, et al.: New outlook on the diagnosis, treatment and follow-up of childhood-onset craniopharyngioma. Nat Rev Endocrinol 13 (5): 299-312, 2017.28155902
Apps JR, Muller HL, Hankinson TC, et al.: Contemporary Biological Insights and Clinical Management of Craniopharyngioma. Endocr Rev 44 (3): 518-538, 2023.36574377
Lohkamp LN, Kasper EM, Pousa AE, et al.: An update on multimodal management of craniopharyngioma in children. Front Oncol 13: 1149428, 2023.37213301
Bogusz A, Müller HL: Childhood-onset craniopharyngioma: latest insights into pathology, diagnostics, treatment, and follow-up. Expert Rev Neurother 18 (10): 793-806, 2018.30257123
Morisako H, Goto T, Goto H, et al.: Aggressive surgery based on an anatomical subclassification of craniopharyngiomas. Neurosurg Focus 41 (6): E10, 2016.27903115
Sands SA, Milner JS, Goldberg J, et al.: Quality of life and behavioral follow-up study of pediatric survivors of craniopharyngioma. J Neurosurg 103 (4 Suppl): 302-11, 2005.16270681
Bakhsheshian J, Jin DL, Chang KE, et al.: Risk factors associated with the surgical management of craniopharyngiomas in pediatric patients: analysis of 1961 patients from a national registry database. Neurosurg Focus 41 (6): E8, 2016.27903117
Locatelli D, Massimi L, Rigante M, et al.: Endoscopic endonasal transsphenoidal surgery for sellar tumors in children. Int J Pediatr Otorhinolaryngol 74 (11): 1298-302, 2010.20828839
Chivukula S, Koutourousiou M, Snyderman CH, et al.: Endoscopic endonasal skull base surgery in the pediatric population. J Neurosurg Pediatr 11 (3): 227-41, 2013.23240846
Mazzatenta D, Zoli M, Guaraldi F, et al.: Outcome of Endoscopic Endonasal Surgery in Pediatric Craniopharyngiomas. World Neurosurg 134: e277-e288, 2020.31629927
Lee JA, Cooper RL, Nguyen SA, et al.: Endonasal Endoscopic Surgery for Pediatric Sellar and Suprasellar Lesions: A Systematic Review and Meta-analysis. Otolaryngol Head Neck Surg 163 (2): 284-292, 2020.32204653
Müller HL, Gebhardt U, Teske C, et al.: Post-operative hypothalamic lesions and obesity in childhood craniopharyngioma: results of the multinational prospective trial KRANIOPHARYNGEOM 2000 after 3-year follow-up. Eur J Endocrinol 165 (1): 17-24, 2011.21490122
Clark AJ, Cage TA, Aranda D, et al.: Treatment-related morbidity and the management of pediatric craniopharyngioma: a systematic review. J Neurosurg Pediatr 10 (4): 293-301, 2012.22920295
Lin LL, El Naqa I, Leonard JR, et al.: Long-term outcome in children treated for craniopharyngioma with and without radiotherapy. J Neurosurg Pediatr 1 (2): 126-30, 2008.18352781
Elowe-Gruau E, Beltrand J, Brauner R, et al.: Childhood craniopharyngioma: hypothalamus-sparing surgery decreases the risk of obesity. J Clin Endocrinol Metab 98 (6): 2376-82, 2013.23633208
Müller HL: Childhood craniopharyngioma: current controversies on management in diagnostics, treatment and follow-up. Expert Rev Neurother 10 (4): 515-24, 2010.20367205
Winkfield KM, Tsai HK, Yao X, et al.: Long-term clinical outcomes following treatment of childhood craniopharyngioma. Pediatr Blood Cancer 56 (7): 1120-6, 2011.21488157
Jimenez RB, Ahmed S, Johnson A, et al.: Proton Radiation Therapy for Pediatric Craniopharyngioma. Int J Radiat Oncol Biol Phys 110 (5): 1480-1487, 2021.33662460
Eveslage M, Calaminus G, Warmuth-Metz M, et al.: The Postopera tive Quality of Life in Children and Adolescents with Craniopharyngioma. Dtsch Arztebl Int 116 (18): 321-328, 2019.31219033
Merchant TE, Hua CH, Shukla H, et al.: Proton versus photon radiotherapy for common pediatric brain tumors: comparison of models of dose characteristics and their relationship to cognitive function. Pediatr Blood Cancer 51 (1): 110-7, 2008.18306274
Merchant TE, Kun LE, Hua CH, et al.: Disease control after reduced volume conformal and intensity modulated radiation therapy for childhood craniopharyngioma. Int J Radiat Oncol Biol Phys 85 (4): e187-92, 2013.23245282
Schoenfeld A, Pekmezci M, Barnes MJ, et al.: The superiority of conservative resection and adjuvant radiation for craniopharyngiomas. J Neurooncol 108 (1): 133-9, 2012.22350375
Edmonston DY, Wu S, Li Y, et al.: Limited surgery and conformal photon radiation therapy for pediatric craniopharyngioma: long-term results from the RT1 protocol. Neuro Oncol 24 (12): 2200-2209, 2022.35556133
Clark AJ, Cage TA, Aranda D, et al.: A systematic review of the results of surgery and radiotherapy on tumor control for pediatric craniopharyngioma. Childs Nerv Syst 29 (2): 231-8, 2013.23089933
Beckhaus J, Friedrich C, Boekhoff S, et al.: Outcome after pediatric craniopharyngioma: the role of age at diagnosis and hypothalamic damage. Eur J Endocrinol 188 (3): , 2023.36857103
Kiehna EN, Merchant TE: Radiation therapy for pediatric craniopharyngioma. Neurosurg Focus 28 (4): E10, 2010.20367354
Harrabi SB, Adeberg S, Welzel T, et al.: Long term results after fractionated stereotactic radiotherapy (FSRT) in patients with craniopharyngioma: maximal tumor control with minimal side effects. Radiat Oncol 9: 203, 2014.25227427
Lo AC, Howard AF, Nichol A, et al.: Long-term outcomes and complications in patients with craniopharyngioma: the British Columbia Cancer Agency experience. Int J Radiat Oncol Biol Phys 88 (5): 1011-8, 2014.24661653
Bishop AJ, Greenfield B, Mahajan A, et al.: Proton beam therapy versus conformal photon radiation therapy for childhood craniopharyngioma: multi-institutional analysis of outcomes, cyst dynamics, and toxicity. Int J Radiat Oncol Biol Phys 90 (2): 354-61, 2014.25052561
Winkfield KM, Linsenmeier C, Yock TI, et al.: Surveillance of craniopharyngioma cyst growth in children treated with proton radiotherapy. Int J Radiat Oncol Biol Phys 73 (3): 716-21, 2009.18676089
Beltran C, Roca M, Merchant TE: On the benefits and risks of proton therapy in pediatric craniopharyngioma. Int J Radiat Oncol Biol Phys 82 (2): e281-7, 2012.21570209
Boehling NS, Grosshans DR, Bluett JB, et al.: Dosimetric comparison of three-dimensional conformal proton radiotherapy, intensity-modulated proton therapy, and intensity-modulated radiotherapy for treatment of pediatric craniopharyngiomas. Int J Radiat Oncol Biol Phys 82 (2): 643-52, 2012.21277111
Shi Z, Esiashvili N, Janss AJ, et al.: Transient enlargement of craniopharyngioma after radiation therapy: pattern of magnetic resonance imaging response following radiation. J Neurooncol 109 (2): 349-55, 2012.22692563
Ishida M, Hotta M, Tsukamura A, et al.: Malignant transformation in craniopharyngioma after radiation therapy: a case report and review of the literature. Clin Neuropathol 29 (1): 2-8, 2010 Jan-Feb.20040326
Aquilina K, Merchant TE, Rodriguez-Galindo C, et al.: Malignant transformation of irradiated craniopharyngioma in children: report of 2 cases. J Neurosurg Pediatr 5 (2): 155-61, 2010.20121363
Merchant TE, Hoehn ME, Khan RB, et al.: Proton therapy and limited surgery for paediatric and adolescent patients with craniopharyngioma (RT2CR): a single-arm, phase 2 study. Lancet Oncol 24 (5): 523-534, 2023.37084748
Merchant TE, Dangda S, Hoehn ME, et al.: Pediatric Craniopharyngioma: The Effect of Visual Deficits and Hormone Deficiencies on Long-Term Cognitive Outcomes After Conformal Photon Radiation Therapy. Int J Radiat Oncol Biol Phys 115 (3): 581-591, 2023.36130625
Bischoff M, Khalil DA, Frisch S, et al.: Outcome After Modern Proton Beam Therapy in Childhood Craniopharyngioma: Results of the Prospective Registry Study KiProReg. Int J Radiat Oncol Biol Phys 120 (1): 137-148, 2024.38492813
Cinalli G, Spennato P, Cianciulli E, et al.: The role of transventricular neuroendoscopy in the management of craniopharyngiomas: three patient reports and review of the literature. J Pediatr Endocrinol Metab 19 (Suppl 1): 341-54, 2006.16700310
Schubert T, Trippel M, Tacke U, et al.: Neurosurgical treatment strategies in childhood craniopharyngiomas: is less more? Childs Nerv Syst 25 (11): 1419-27, 2009.19714341
Julow J, Backlund EO, Lányi F, et al.: Long-term results and late complications after intracavitary yttrium-90 colloid irradiation of recurrent cystic craniopharyngiomas. Neurosurgery 61 (2): 288-95; discussion 295-6, 2007.17762741
Barriger RB, Chang A, Lo SS, et al.: Phosphorus-32 therapy for cystic craniopharyngiomas. Radiother Oncol 98 (2): 207-12, 2011.21269713
Maarouf M, El Majdoub F, Fuetsch M, et al.: Stereotactic intracavitary brachytherapy with P-32 for cystic craniopharyngiomas in children. Strahlenther Onkol 192 (3): 157-65, 2016.26541336
Kickingereder P, Maarouf M, El Majdoub F, et al.: Intracavitary brachytherapy using stereotactically applied phosphorus-32 colloid for treatment of cystic craniopharyngiomas in 53 patients. J Neurooncol 109 (2): 365-74, 2012.22717668
Ierardi DF, Fernandes MJ, Silva IR, et al.: Apoptosis in alpha interferon (IFN-alpha) intratumoral chemotherapy for cystic craniopharyngiomas. Childs Nerv Syst 23 (9): 1041-6, 2007.17593372
Cavalheiro S, Di Rocco C, Valenzuela S, et al.: Craniopharyngiomas: intratumoral chemotherapy with interferon-alpha: a multicenter preliminary study with 60 cases. Neurosurg Focus 28 (4): E12, 2010.20367356
Kilday JP, Caldarelli M, Massimi L, et al.: Intracystic interferon-alpha in pediatric craniopharyngioma patients: an international multicenter assessment on behalf of SIOPE and ISPN. Neuro Oncol 19 (10): 1398-1407, 2017.28499018
Linnert M, Gehl J: Bleomycin treatment of brain tumors: an evaluation. Anticancer Drugs 20 (3): 157-64, 2009.19396014
Hukin J, Steinbok P, Lafay-Cousin L, et al.: Intracystic bleomycin therapy for craniopharyngioma in children: the Canadian experience. Cancer 109 (10): 2124-31, 2007.17407137
Guimarães MM, Cardeal DD, Teixeira MJ, et al.: Brachytherapy in paediatric craniopharyngiomas: a systematic review and meta-analysis of recent literature. Childs Nerv Syst 38 (2): 253-262, 2022.34618201
Petralia F, Tignor N, Reva B, et al.: Integrated Proteogenomic Characterization across Major Histological Types of Pediatric Brain Cancer. Cell 183 (7): 1962-1985.e31, 2020.33242424
Apps JR, Carreno G, Gonzalez-Meljem JM, et al.: Tumour compartment transcriptomics demonstrates the activation of inflammatory and odontogenic programmes in human adamantinomatous craniopharyngioma and identifies the MAPK/ERK pathway as a novel therapeutic target. Acta Neuropathol 135 (5): 757-777, 2018.29541918
Hengartner AC, Prince E, Vijmasi T, et al.: Adamantinomatous craniopharyngioma: moving toward targeted therapies. Neurosurg Focus 48 (1): E7, 2020.31896087
Coy S, Rashid R, Lin JR, et al.: Multiplexed immunofluorescence reveals potential PD-1/PD-L1 pathway vulnerabilities in craniopharyngioma. Neuro Oncol 20 (8): 1101-1112, 2018.29509940
Grob S, Mirsky DM, Donson AM, et al.: Targeting IL-6 Is a Potential Treatment for Primary Cystic Craniopharyngioma. Front Oncol 9: 791, 2019.31497533
Donson AM, Apps J, Griesinger AM, et al.: Molecular Analyses Reveal Inflammatory Mediators in the Solid Component and Cyst Fluid of Human Adamantinomatous Craniopharyngioma. J Neuropathol Exp Neurol 76 (9): 779-788, 2017.28859336

## Treatment of Progressive or Recurrent Childhood Craniopharyngioma

Progression or recurrence of craniopharyngioma varies according to the type of up-front therapy, but it has been reported to be between 20% (patients who received a subtotal resection and radiation therapy) and 90% (patients who received a subtotal resection without radiation therapy).[1-3]

Treatment options for recurrent childhood craniopharyngioma include the following:

1. Surgery.
2. Radiation therapy, including radiosurgery.
3. Intracystic therapy (intracavitary instillation of radioactive phosphorus P 32 [32P] or bleomycin for those with cystic recurrences, where these agents are available).
4. Systemic targeted therapy.
5. Observation.

### Surgery

The management of recurrent craniopharyngioma is determined largely by previous therapy. Repeat attempts at gross-total resections are difficult, and long-term disease control is achieved less often.[4][Level of evidence C2]; [3] Complications are more frequent than with initial surgery.[5][Level of evidence C2]

### Radiation Therapy

If not previously employed, external-beam radiation therapy remains an option, including the consideration of radiosurgery in selected circumstances.[6][Level of evidence C2] Repeat irradiation in different forms is also an option when considering prior radiation exposures and toxicities. Reirradiation has been shown to be feasible in regaining tumor control and providing symptom relief.[7][Level of evidence C3] The types of radiation therapy can range from standard conformal radiation approaches to Gamma Knife therapy.[8][Level of evidence C3]

### Intracystic Therapy

Cystic recurrences may be treated with intracavitary instillation of varying agents via placement of an Ommaya catheter.[9] These agents have included radioactive 32P or other compounds,[10-12]; [13][Level of evidence B4] bleomycin,[14]; [15][Level of evidence C2] or, previously, interferon-alpha (which is no longer commercially available).[16]; [17][Level of evidence C1]; [18][Level of evidence C2] These strategies have been useful in certain cases, and a low risk of complications has been reported. However, none of these approaches has shown efficacy against solid portions of the tumor.

### Systemic and Targeted Therapy

Although systemic therapy is generally not used, a small series has shown that the use of subcutaneous peginterferon alpha-2b to manage cystic recurrences can result in durable responses; however, this agent is no longer commercially available.[19][Level of evidence C2]

### Observation

In select cases of asymptomatic patients with minimal (<25%) tumor progression, it may be possible to safely observe these patients. Intervention can begin when new symptoms develop or further tumor growth is identified on subsequent imaging.[20]

### Treatment Options Under Clinical Evaluation

Information about NCI-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search/advanced). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

Preclinical contemporary evaluations have identified active molecular and immune pathways in craniopharyngioma that may be targetable using commercially available or investigational agents. Specifically, MAPK and RAF pathways and immune/inflammatory targets such as PD-1 pathway components and IL-6 have been identified.[21-27][Level of evidence C1]

The following are examples of national and/or institutional clinical trials that are currently being conducted:

- NCT05465174 (https://www.cancer.gov/clinicaltrials/NCT05465174) (Nivolumab and Tovorafenib [DAY101] for Treatment of Craniopharyngioma in Children and Young Adults): This study assesses the tolerability and efficacy of combination therapy with PD-1 (nivolumab) and pan-RAF kinase (tovorafenib) inhibition for the treatment of children and young adults with craniopharyngioma.
- NCT05286788 (https://www.cancer.gov/clinicaltrials/NCT05286788) (Binimetinib [Mektovi] for the Treatment of Pediatric Adamantinomatous Craniopharyngioma): This phase II study will treat pediatric patients diagnosed with recurrent adamantinomatous craniopharyngioma with binimetinib (mektovi).
- NCT05233397 (https://www.cancer.gov/clinicaltrials/NCT05233397) (Tocilizumab [Actemra] for the Treatment of Progressive or Recurrent Pediatric Adamantinomatous Craniopharyngioma): This phase II study will treat pediatric patients diagnosed with recurrent adamantinomatous craniopharyngioma with tocilizumab (actemra).

### References

Yang I, Sughrue ME, Rutkowski MJ, et al.: Craniopharyngioma: a comparison of tumor control with various treatment strategies. Neurosurg Focus 28 (4): E5, 2010.20367362
Bogusz A, Müller HL: Childhood-onset craniopharyngioma: latest insights into pathology, diagnostics, treatment, and follow-up. Expert Rev Neurother 18 (10): 793-806, 2018.30257123
Liubinas SV, Munshey AS, Kaye AH: Management of recurrent craniopharyngioma. J Clin Neurosci 18 (4): 451-7, 2011.21316970
Vinchon M, Dhellemmes P: Craniopharyngiomas in children: recurrence, reoperation and outcome. Childs Nerv Syst 24 (2): 211-7, 2008.17786455
Jang WY, Lee KS, Son BC, et al.: Repeat operations in pediatric patients with recurrent craniopharyngiomas. Pediatr Neurosurg 45 (6): 451-5, 2009.20110758
Xu Z, Yen CP, Schlesinger D, et al.: Outcomes of Gamma Knife surgery for craniopharyngiomas. J Neurooncol 104 (1): 305-13, 2011.21153860
Foran SJ, Laperriere N, Edelstein K, et al.: Reirradiation for recurrent craniopharyngioma. Adv Radiat Oncol 5 (6): 1305-1310, 2020.33305092
Kobayashi T: Long-term results of gamma knife radiosurgery for 100 consecutive cases of craniopharyngioma and a treatment strategy. Prog Neurol Surg 22: 63-76, 2009.18948720
Steinbok P, Hukin J: Intracystic treatments for craniopharyngioma. Neurosurg Focus 28 (4): E13, 2010.20367357
Julow J, Backlund EO, Lányi F, et al.: Long-term results and late complications after intracavitary yttrium-90 colloid irradiation of recurrent cystic craniopharyngiomas. Neurosurgery 61 (2): 288-95; discussion 295-6, 2007.17762741
Barriger RB, Chang A, Lo SS, et al.: Phosphorus-32 therapy for cystic craniopharyngiomas. Radiother Oncol 98 (2): 207-12, 2011.21269713
Maarouf M, El Majdoub F, Fuetsch M, et al.: Stereotactic intracavitary brachytherapy with P-32 for cystic craniopharyngiomas in children. Strahlenther Onkol 192 (3): 157-65, 2016.26541336
Kickingereder P, Maarouf M, El Majdoub F, et al.: Intracavitary brachytherapy using stereotactically applied phosphorus-32 colloid for treatment of cystic craniopharyngiomas in 53 patients. J Neurooncol 109 (2): 365-74, 2012.22717668
Linnert M, Gehl J: Bleomycin treatment of brain tumors: an evaluation. Anticancer Drugs 20 (3): 157-64, 2009.19396014
Hukin J, Steinbok P, Lafay-Cousin L, et al.: Intracystic bleomycin therapy for craniopharyngioma in children: the Canadian experience. Cancer 109 (10): 2124-31, 2007.17407137
Ierardi DF, Fernandes MJ, Silva IR, et al.: Apoptosis in alpha interferon (IFN-alpha) intratumoral chemotherapy for cystic craniopharyngiomas. Childs Nerv Syst 23 (9): 1041-6, 2007.17593372
Cavalheiro S, Di Rocco C, Valenzuela S, et al.: Craniopharyngiomas: intratumoral chemotherapy with interferon-alpha: a multicenter preliminary study with 60 cases. Neurosurg Focus 28 (4): E12, 2010.20367356
Kilday JP, Caldarelli M, Massimi L, et al.: Intracystic interferon-alpha in pediatric craniopharyngioma patients: an international multicenter assessment on behalf of SIOPE and ISPN. Neuro Oncol 19 (10): 1398-1407, 2017.28499018
Yeung JT, Pollack IF, Panigrahy A, et al.: Pegylated interferon-α-2b for children with recurrent craniopharyngioma. J Neurosurg Pediatr 10 (6): 498-503, 2012.23061825
Fouda MA, Karsten M, Staffa SJ, et al.: Management strategies for recurrent pediatric craniopharyngioma: new recommendations. J Neurosurg Pediatr 27 (5): 548-555, 2021.33668031
Petralia F, Tignor N, Reva B, et al.: Integrated Proteogenomic Characterization across Major Histological Types of Pediatric Brain Cancer. Cell 183 (7): 1962-1985.e31, 2020.33242424
Apps JR, Muller HL, Hankinson TC, et al.: Contemporary Biological Insights and Clinical Management of Craniopharyngioma. Endocr Rev 44 (3): 518-538, 2023.36574377
Apps JR, Carreno G, Gonzalez-Meljem JM, et al.: Tumour compartment transcriptomics demonstrates the activation of inflammatory and odontogenic programmes in human adamantinomatous craniopharyngioma and identifies the MAPK/ERK pathway as a novel therapeutic target. Acta Neuropathol 135 (5): 757-777, 2018.29541918
Hengartner AC, Prince E, Vijmasi T, et al.: Adamantinomatous craniopharyngioma: moving toward targeted therapies. Neurosurg Focus 48 (1): E7, 2020.31896087
Coy S, Rashid R, Lin JR, et al.: Multiplexed immunofluorescence reveals potential PD-1/PD-L1 pathway vulnerabilities in craniopharyngioma. Neuro Oncol 20 (8): 1101-1112, 2018.29509940
Grob S, Mirsky DM, Donson AM, et al.: Targeting IL-6 Is a Potential Treatment for Primary Cystic Craniopharyngioma. Front Oncol 9: 791, 2019.31497533
Donson AM, Apps J, Griesinger AM, et al.: Molecular Analyses Reveal Inflammatory Mediators in the Solid Component and Cyst Fluid of Human Adamantinomatous Craniopharyngioma. J Neuropathol Exp Neurol 76 (9): 779-788, 2017.28859336

## Late Effects in Patients Treated for Childhood Craniopharyngioma

Quality-of-life issues are important to pediatric patients with craniopharyngiomas and are difficult to generalize because of the various treatment modalities. In one series of 261 patients diagnosed with craniopharyngiomas before 2000, hypothalamic involvement was associated with lower overall survival (OS), impaired quality of life, and severe obesity.[1][Level of evidence C1] Other studies investigating quality of life in large, multi-institutional cohorts have correlated worse quality-of-life outcomes with variables such as older age at diagnosis, hypothalamic involvement, degree of postoperative hypothalamic injury, and degree of tumor resection.[2,3] Regardless of therapy, most patients with craniopharyngiomas experience long-term effects from the tumor and associated therapies.[2-6][Level of evidence B3]

Late effects of treatment for childhood craniopharyngioma include the following:

- Behavioral issues and memory deficits. Although intelligence quotient is usually maintained, behavioral issues and other cognitive domains such as memory, executive function, and attention are commonly impacted.[4,6-8] Memory and neurocognitive effects may be mitigated by the use of proton radiation therapy and conformal plans to avoid surrounding normal brain anatomy such as the hypothalamus and hippocampus.[9]; [10][Level of evidence B3]
- Visual disturbances. Visual disturbances, including visual field and acuity defects, have been reported. These deficits may be decreased with less aggressive surgical approaches or radiation therapy alone.[11][Level of evidence C1]; [6,10]
- Endocrine abnormalities. Endocrine abnormalities result in the almost universal need for lifelong endocrine replacement with multiple pituitary hormones.[5,8]; [12-14][Level of evidence C1] Similar to visual disturbances, endocrine injury can be offset by limited surgical resection [5,6,15-17] and intracystic therapies that minimize invasive interventions.[18]
- Decreased height. Growth hormone replacement therapy is used to improve growth in children treated for craniopharyngiomas. Growth hormone replacement initiated in childhood results in increases in height without impact on OS and progression-free survival when compared with children who did not receive growth hormone.[19][Level of evidence C1]; [20] Growth hormone administration beginning 1 year after diagnosis may be associated with early improvements in quality of life when measured at 3 years postdiagnosis.[21][Level of evidence C1] Published consensus guidelines do not support an increased risk of recurrence with use of growth hormones. They recommend considering growth hormone replacement therapy as early as 3 months after completing cancer therapy in patients who have stable disease and significant growth deficits.[22][Level of evidence D]
- Obesity. Obesity, which can be life-threatening, and the development of metabolic syndrome, including nonalcoholic fatty liver disease, can occur.[23,24] Children who undergo complete resection or subtotal resection may develop obesity, suggesting that a predilection to obesity may be a component of the disease itself, not the result of direct hypothalamic injury.[25][Level of evidence C1] Severe obesity seen in patients with craniopharyngiomas is more likely a result of a combination of factors such as tumor location and treatment characteristics, with multifaceted downstream impacts.[26][Level of evidence C1] In a study of 709 patients with craniopharyngiomas, posterior hypothalamic involvement or operative injury to the posterior hypothalamus appeared to be a key factor in the development of severe obesity.[3]
- Vasculopathies and stroke. Vasculopathies and subsequent strokes may result from local irradiation.[27,28] Previous studies have suggested that long-term growth hormone replacement may reduce the risk of stroke. Studies have also shown that pretreatment characteristics such as existing vascular injury, vessel location in the surgical field, and larger radiation doses to vascular structures increase the risk of long-term vessel stenosis.[28]; [29][Level of evidence C1] In a study of 94 pediatric patients with craniopharyngiomas who were treated with surgery and 54 Gy of proton therapy, the strongest predictor of postradiation therapy vasculopathy was preexisting vasculopathy.[29] The impact of proton radiation therapy was negligible within the operative corridor. Despite the high incidence (n = 27, 28.7%) of imaging-only evidence of subclinical stenosis events, only five patients required a revascularization procedure. In one of these patients, high-grade stenosis was present before radiation therapy. Two patients had previous tumor recurrences that required multiple resections before radiation therapy.
- Subsequent neoplasms. Subsequent neoplasms may result from local irradiation.[27] Secondary malignancies related to radiation therapy that specifically involve the pituitary/sellar region can range from malignant tumors, such as high-grade gliomas, to meningiomas. This risk is increased in patients who are younger at the time of radiation therapy.[30]

For information about the incidence, type, and monitoring of late effects in childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

### References

Sterkenburg AS, Hoffmann A, Gebhardt U, et al.: Survival, hypothalamic obesity, and neuropsychological/psychosocial status after childhood-onset craniopharyngioma: newly reported long-term outcomes. Neuro Oncol 17 (7): 1029-38, 2015.25838139
Eveslage M, Calaminus G, Warmuth-Metz M, et al.: The Postopera tive Quality of Life in Children and Adolescents with Craniopharyngioma. Dtsch Arztebl Int 116 (18): 321-328, 2019.31219033
Beckhaus J, Friedrich C, Boekhoff S, et al.: Outcome after pediatric craniopharyngioma: the role of age at diagnosis and hypothalamic damage. Eur J Endocrinol 188 (3): , 2023.36857103
Apps JR, Muller HL, Hankinson TC, et al.: Contemporary Biological Insights and Clinical Management of Craniopharyngioma. Endocr Rev 44 (3): 518-538, 2023.36574377
Müller HL: Childhood craniopharyngioma: current controversies on management in diagnostics, treatment and follow-up. Expert Rev Neurother 10 (4): 515-24, 2010.20367205
Bogusz A, Müller HL: Childhood-onset craniopharyngioma: latest insights into pathology, diagnostics, treatment, and follow-up. Expert Rev Neurother 18 (10): 793-806, 2018.30257123
Winkfield KM, Tsai HK, Yao X, et al.: Long-term clinical outcomes following treatment of childhood craniopharyngioma. Pediatr Blood Cancer 56 (7): 1120-6, 2011.21488157
Giese H, Haenig B, Haenig A, et al.: Neurological and neuropsychological outcome after resection of craniopharyngiomas. J Neurosurg 132 (5): 1425-1434, 2019.31003210
Özyurt J, Thiel CM, Lorenzen A, et al.: Neuropsychological outcome in patients with childhood craniopharyngioma and hypothalamic involvement. J Pediatr 164 (4): 876-881.e4, 2014.24507865
Merchant TE, Hoehn ME, Khan RB, et al.: Proton therapy and limited surgery for paediatric and adolescent patients with craniopharyngioma (RT2CR): a single-arm, phase 2 study. Lancet Oncol 24 (5): 523-534, 2023.37084748
Wan MJ, Zapotocky M, Bouffet E, et al.: Long-term visual outcomes of craniopharyngioma in children. J Neurooncol 137 (3): 645-651, 2018.29344823
Vinchon M, Weill J, Delestret I, et al.: Craniopharyngioma and hypothalamic obesity in children. Childs Nerv Syst 25 (3): 347-52, 2009.19057910
Dolson EP, Conklin HM, Li C, et al.: Predicting behavioral problems in craniopharyngioma survivors after conformal radiation therapy. Pediatr Blood Cancer 52 (7): 860-4, 2009.19191345
Kawamata T, Amano K, Aihara Y, et al.: Optimal treatment strategy for craniopharyngiomas based on long-term functional outcomes of recent and past treatment modalities. Neurosurg Rev 33 (1): 71-81, 2010.19669813
Müller HL: Consequences of craniopharyngioma surgery in children. J Clin Endocrinol Metab 96 (7): 1981-91, 2011.21508127
Marcus HJ, Rasul FT, Hussein Z, et al.: Craniopharyngioma in children: trends from a third consecutive single-center cohort study. J Neurosurg Pediatr 25 (3): 242-250, 2019.31860822
Clark AJ, Cage TA, Aranda D, et al.: Treatment-related morbidity and the management of pediatric craniopharyngioma: a systematic review. J Neurosurg Pediatr 10 (4): 293-301, 2012.22920295
Lohkamp LN, Kasper EM, Pousa AE, et al.: An update on multimodal management of craniopharyngioma in children. Front Oncol 13: 1149428, 2023.37213301
Boekhoff S, Bogusz A, Sterkenburg AS, et al.: Long-term Effects of Growth Hormone Replacement Therapy in Childhood-onset Craniopharyngioma: Results of the German Craniopharyngioma Registry (HIT-Endo). Eur J Endocrinol 179 (5): 331-341, 2018.30139824
Nguyen Quoc A, Beccaria K, González Briceño L, et al.: GH and Childhood-onset Craniopharyngioma: When to Initiate GH Replacement Therapy? J Clin Endocrinol Metab 108 (8): 1929-1936, 2023.36794424
Heinks K, Boekhoff S, Hoffmann A, et al.: Quality of life and growth after childhood craniopharyngioma: results of the multinational trial KRANIOPHARYNGEOM 2007. Endocrine 59 (2): 364-372, 2018.29230635
Boguszewski MCS, Boguszewski CL, Chemaitilly W, et al.: Safety of growth hormone replacement in survivors of cancer and intracranial and pituitary tumours: a consensus statement. Eur J Endocrinol 186 (6): P35-P52, 2022.35319491
Elowe-Gruau E, Beltrand J, Brauner R, et al.: Childhood craniopharyngioma: hypothalamus-sparing surgery decreases the risk of obesity. J Clin Endocrinol Metab 98 (6): 2376-82, 2013.23633208
Hoffmann A, Bootsveld K, Gebhardt U, et al.: Nonalcoholic fatty liver disease and fatigue in long-term survivors of childhood-onset craniopharyngioma. Eur J Endocrinol 173 (3): 389-97, 2015.26088821
Tan TS, Patel L, Gopal-Kothandapani JS, et al.: The neuroendocrine sequelae of paediatric craniopharyngioma: a 40-year meta-data analysis of 185 cases from three UK centres. Eur J Endocrinol 176 (3): 359-369, 2017.28073908
Otte A, Müller HL: Childhood-onset Craniopharyngioma. J Clin Endocrinol Metab 106 (10): e3820-e3836, 2021.34086900
Kiehna EN, Merchant TE: Radiation therapy for pediatric craniopharyngioma. Neurosurg Focus 28 (4): E10, 2010.20367354
Lo AC, Howard AF, Nichol A, et al.: A Cross-Sectional Cohort Study of Cerebrovascular Disease and Late Effects After Radiation Therapy for Craniopharyngioma. Pediatr Blood Cancer 63 (5): 786-93, 2016.26756999
Lucas JT, Faught AM, Hsu CY, et al.: Pre- and Posttherapy Risk Factors for Vasculopathy in Pediatric Patients With Craniopharyngioma Treated With Surgery and Proton Radiation Therapy. Int J Radiat Oncol Biol Phys 113 (1): 152-160, 2022.34990778
Burman P, van Beek AP, Biller BM, et al.: Radiotherapy, Especially at Young Age, Increases the Risk for De Novo Brain Tumors in Patients Treated for Pituitary/Sellar Lesions. J Clin Endocrinol Metab 102 (3): 1051-1058, 2017.28359095

## Latest Updates to This Summary (11/26/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Treatment of Newly Diagnosed Childhood Craniopharyngioma

Added text to state that a report from the prospective registry study KiProReg examined the use of proton-beam therapy in 84 children younger than 18 years with craniopharyngioma. The estimated 3-year overall survival rate was 98.2%, and the progression-free survival rate was 94.7%. With a median follow-up of 4.3 years, late toxicities appeared acceptable. Sixty-three of the patients were treated with pencil-beam scanning, which is considered an advancement in proton technology (cited Bischoff et al. as reference 43).

Late Effects in Patients Treated for Childhood Craniopharyngioma

Added Nguyen Quoc et al. as reference 20.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood craniopharyngioma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Craniopharyngioma Treatment are:

- Kenneth J. Cohen, MD, MBA (Sidney Kimmel Comprehensive Cancer Center at Johns Hopkins Hospital)
- Karen J. Marcus, MD, FACR (Dana-Farber of Boston Children's Cancer Center and Blood Disorders Harvard Medical School)
- Roger J. Packer, MD (Children's National Hospital)
- D. Williams Parsons, MD, PhD (Texas Children's Hospital)
- Malcolm A. Smith, MD, PhD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Craniopharyngioma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/brain/hp/child-cranio-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389330]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).